# Symptom Clusters in Cancer (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathogenesis and treatment of cancer-related symptom clusters. It is intended as a resource to inform and assist clinicians who care for cancer patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

During and after treatment for cancer, patients experience an average of 10 to14 co-occurring symptoms.[1,2] Compared with patients with few or no symptoms, patients with multiple concurrent symptoms may experience worse decrements in physical and cognitive function,[3- 6] quality of life,[3-6] and overall survival.[7] Symptoms that occur together over time may form a cluster.

A symptom cluster is two or more concurrent symptoms with the following properties:[1,8]

- The concurrent symptoms within the cluster are stable (i.e., the same symptoms that comprise clusters are identified at different time points throughout the cancer care trajectory).
- The symptoms within a cluster may share underlying mechanisms.
- The symptoms within a cluster may share outcomes.
- The symptom cluster may have a temporal dimension (i.e., the severity of the symptoms within the cluster may shift together over time).

Symptoms in a cluster may be related to each other in multiple ways. They may share a common set of biological, psychological, or social mechanisms, or they may cause or potentiate one another’s effects.[8] They may also be due to side effects of another treatment. The management of symptom clusters primarily involves identifying relationships among the symptoms. This approach supports strategies that may address multiple symptoms simultaneously. It also avoids unnecessary interventions that can worsen symptom burden and the patient’s quality of life. As advancements in symptom science research are achieved, better therapeutic targets will be identified for improved management of symptom clusters and outcomes.

### References

Miaskowski C, Barsevick A, Berger A, et al.: Advancing Symptom Science Through Symptom Cluster Research: Expert Panel Proceedings and Recommendations. J Natl Cancer Inst 109 (4): , 2017.28119347
Harris CS, Dodd M, Kober KM, et al.: Advances in Conceptual and Methodological Issues in Symptom Cluster Research: A 20-Year Perspective. ANS Adv Nurs Sci 45 (4): 309-322, 2022 Oct-Dec 01.35502915
Dodd MJ, Cho MH, Cooper BA, et al.: Identification of latent classes in patients who are receiving biotherapy based on symptom experience and its effect on functional status and quality of life. Oncol Nurs Forum 38 (1): 33-42, 2011.21186158
Miaskowski C, Dunn L, Ritchie C, et al.: Latent Class Analysis Reveals Distinct Subgroups of Patients Based on Symptom Occurrence and Demographic and Clinical Characteristics. J Pain Symptom Manage 50 (1): 28-37, 2015.25647419
Neijenhuijs KI, Peeters CFW, van Weert H, et al.: Symptom clusters among cancer survivors: what can machine learning techniques tell us? BMC Med Res Methodol 21 (1): 166, 2021.34399698
Trudel-Fitzgerald C, Savard J, Ivers H: Longitudinal changes in clusters of cancer patients over an 18-month period. Health Psychol 33 (9): 1012-22, 2014.23977875
Kerrigan K, Patel SB, Haaland B, et al.: Prognostic Significance of Patient-Reported Outcomes in Cancer. JCO Oncol Pract 16 (4): e313-e323, 2020.32048943
Aktas A: Cancer symptom clusters: current concepts and controversies. Curr Opin Support Palliat Care 7 (1): 38-44, 2013.23287418

## Identification of Symptom Clusters: Methods and Limitations

To identify cancer-related symptom clusters, investigators ask patients to complete valid, reliable symptom questionnaires.[1] Symptom data can also be obtained directly from clinicians and/or medical records. Symptom data are analyzed to identify symptoms that occur in clusters, using methods such as exploratory factor analysis (EFA).[2,3] The objective of an EFA is to identify groups of symptoms that are correlated with each other. These groups are known as factors or, in the field of symptom cluster research, symptom clusters. Factor analysis is consistent with a biopsychosocial theory [4] that the underlying mechanisms of symptoms are likely shared within symptom clusters.

Another method for identifying symptom clusters is through structural equation modeling (SEM).[3] Compared with factor analysis that retrospectively identifies clusters, SEM requires an a priori hypothesis about a common cause of the symptom cluster.[3] One benefit of SEM is that direct and indirect, as well as latent, associations between factors can be identified.[3] This method can help identify risk factors in future patients.

Once a symptom cluster has been identified, investigators perform additional analyses to describe patients’ experiences with a symptom cluster. A person-centered analytic approach, such as latent class profile analysis, is used to identify and describe subgroups of patients who are similarly burdened by a symptom cluster.[5,6] The symptom cluster burden has multiple dimensions, including the occurrence, frequency, severity, and distress associated with the symptom cluster.[6,7] Determining which patients are at risk for the highest level of symptom cluster burden and associated underlying mechanisms are ongoing areas of research.

Common characteristics associated with a higher symptom cluster burden include the following:[1,8-10]

- Younger age.
- Non-White race and ethnicity.
- Unmarried/unpartnered.
- Unemployed.
- Lower annual income.
- Child care responsibilities.
- Higher comorbidity burden.
- Lower functional status.

One limitation in identifying and managing symptom clusters is that symptom assessment tools and analytic approaches may vary across clinical practices. However, the consistency of symptom clusters identified across studies using different instruments supports the fact that core symptoms are being captured and that underlying mechanisms may be associated with symptoms within a cluster. For example, two symptom clusters common to multiple cancer diagnoses and treatment regimens are a sickness behavior syndrome (fatigue, sleep disturbance, lethargy, depression, loss of appetite) [11-13] and a psychoneurological symptom cluster (depression, cognitive disturbance, sleep disturbance, fatigue, pain).[14,15] Both of these symptom clusters are associated with underlying inflammatory mechanisms.[11,12,15]

Another limitation is that while some symptom clusters appear to be stable over time, [16,17] a patient’s symptom experience may vary widely.[7] Specifically, the occurrence of symptoms within a cluster, the level of symptom cluster severity, and the level of distress associated with one or more symptom clusters may shift over time in each individual. Symptom clusters can also persist long after treatment.[7,18]

Due to the complexity of symptom clusters, the symptoms within each cluster, and the temporal nature of symptoms/clusters that may shift over time, it is important to continually assess symptoms from diagnosis through the end of life. Retesting symptom clusters through repeated data-driven analyses (e.g., factor analysis,[2,3] SEM,[3]) can help health care professionals to better understand the stability and/or changes in symptom cluster experiences over time. In addition, symptom clusters may differ between individuals who are undergoing active treatment and those who have completed primary therapy.

For more information about individual side effects, see the summaries on Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care).

### References

Miaskowski C, Cooper BA, Paul SM, et al.: Subgroups of patients with cancer with different symptom experiences and quality-of-life outcomes: a cluster analysis. Oncol Nurs Forum 33 (5): E79-89, 2006.16955115
Skerman HM, Yates PM, Battistutta D: Identification of cancer-related symptom clusters: an empirical comparison of exploratory factor analysis methods. J Pain Symptom Manage 44 (1): 10-22, 2012.22672916
Olson K, Hayduk L, Thomas J: Comparing two approaches for studying symptom clusters: factor analysis and structural equation modeling. Support Care Cancer 22 (1): 153-61, 2014.24013598
Borrell-Carrió F, Suchman AL, Epstein RM: The biopsychosocial model 25 years later: principles, practice, and scientific inquiry. Ann Fam Med 2 (6): 576-82, 2004.15576544
Miaskowski C, Dunn L, Ritchie C, et al.: Latent Class Analysis Reveals Distinct Subgroups of Patients Based on Symptom Occurrence and Demographic and Clinical Characteristics. J Pain Symptom Manage 50 (1): 28-37, 2015.25647419
Miaskowski C: Future Directions in Symptom Cluster Research. Semin Oncol Nurs 32 (4): 405-415, 2016.27776833
Miaskowski C, Barsevick A, Berger A, et al.: Advancing Symptom Science Through Symptom Cluster Research: Expert Panel Proceedings and Recommendations. J Natl Cancer Inst 109 (4): , 2017.28119347
Doong SH, Dhruva A, Dunn LB, et al.: Associations between cytokine genes and a symptom cluster of pain, fatigue, sleep disturbance, and depression in patients prior to breast cancer surgery. Biol Res Nurs 17 (3): 237-47, 2015.25304131
Hammer MJ, Cooper B, Paul SM, et al.: Identification of Distinct Symptom Profiles in Cancer Patients Using a Pre-Specified Symptom Cluster. J Pain Symptom Manage 64 (1): 17-27, 2022.35339613
Pud D, Ben Ami S, Cooper BA, et al.: The symptom experience of oncology outpatients has a different impact on quality-of-life outcomes. J Pain Symptom Manage 35 (2): 162-70, 2008.18082357
Aktas A: Cancer symptom clusters: current concepts and controversies. Curr Opin Support Palliat Care 7 (1): 38-44, 2013.23287418
Chan CW, Lee PH, Molassiotis A, et al.: Symptom Clusters in Postchemotherapy Neutropenic Fever in Hematological Malignancy: Associations Among Sickness Behavior Symptom Cluster, Inflammatory Biomarkers of Procalcitonin and C-Reactive Protein, and Febrile Measures. J Pain Symptom Manage 59 (6): 1204-1211, 2020.31887406
Wood LJ, Weymann K: Inflammation and neural signaling: etiologic mechanisms of the cancer treatment-related symptom cluster. Curr Opin Support Palliat Care 7 (1): 54-9, 2013.23314015
Trudel-Fitzgerald C, Savard J, Ivers H: Longitudinal changes in clusters of cancer patients over an 18-month period. Health Psychol 33 (9): 1012-22, 2014.23977875
Kim HJ, Barsevick AM, Fang CY, et al.: Common biological pathways underlying the psychoneurological symptom cluster in cancer patients. Cancer Nurs 35 (6): E1-E20, 2012.22228391
Kim E, Jahan T, Aouizerat BE, et al.: Changes in symptom clusters in patients undergoing radiation therapy. Support Care Cancer 17 (11): 1383-91, 2009.19242732
Pozzar RA, Hammer MJ, Cooper BA, et al.: Stability of Symptom Clusters in Patients With Gynecologic Cancer Receiving Chemotherapy. Cancer Nurs 45 (4): E706-E718, 2022 Jul-Aug 01.34560709
Brant JM, Beck S, Dudley WN, et al.: Symptom trajectories in posttreatment cancer survivors. Cancer Nurs 34 (1): 67-77, 2011.20885306

## Predictors and Outcomes of Select Symptom Clusters

Symptom cluster names are often based on symptoms of the cluster (e.g., psychoneurological[1] and gastrointestinal[2]), although names are not standardized across studies. One frequent unnamed cluster identified across cancer diagnoses includes pain, fatigue, sleep disturbance, and depression.[3] This general symptom cluster has been identified in patients with breast,[4,5] lung,[5,6] gastrointestinal,[5,7] and gynecologic [5,8] cancers. Symptom clusters can also reflect underlying disease (e.g., dyspnea, cough, and fatigue in patients with lung cancer) [9] and/or treatments (e.g., sensory neuropathy symptom cluster, mixed motor-sensory symptom cluster related to chemotherapy-induced peripheral neuropathy).[10]

### References

Kim HJ, Barsevick AM, Fang CY, et al.: Common biological pathways underlying the psychoneurological symptom cluster in cancer patients. Cancer Nurs 35 (6): E1-E20, 2012.22228391
Harris CS, Miaskowski CA, Conley YP, et al.: Gastrointestinal Symptom Cluster is Associated With Epigenetic Regulation of Lymphotoxin Beta in Oncology Patients Receiving Chemotherapy. Biol Res Nurs 25 (1): 51-64, 2023.35929442
Trudel-Fitzgerald C, Savard J, Ivers H: Longitudinal changes in clusters of cancer patients over an 18-month period. Health Psychol 33 (9): 1012-22, 2014.23977875
Doong SH, Dhruva A, Dunn LB, et al.: Associations between cytokine genes and a symptom cluster of pain, fatigue, sleep disturbance, and depression in patients prior to breast cancer surgery. Biol Res Nurs 17 (3): 237-47, 2015.25304131
Miaskowski C, Cooper BA, Paul SM, et al.: Subgroups of patients with cancer with different symptom experiences and quality-of-life outcomes: a cluster analysis. Oncol Nurs Forum 33 (5): E79-89, 2006.16955115
Brant JM, Beck S, Dudley WN, et al.: Symptom trajectories in posttreatment cancer survivors. Cancer Nurs 34 (1): 67-77, 2011.20885306
Lin Y, Bailey DE, Docherty SL, et al.: Distinct morning and evening fatigue profiles in gastrointestinal cancer during chemotherapy. BMJ Support Palliat Care 13 (e2): e373-e381, 2023.34049967
Pozzar RA, Hammer MJ, Cooper BA, et al.: Symptom Clusters in Patients With Gynecologic Cancer Receiving Chemotherapy. Oncol Nurs Forum 48 (4): 441-452, 2021.34143001
Cheville AL, Novotny PJ, Sloan JA, et al.: Fatigue, dyspnea, and cough comprise a persistent symptom cluster up to five years after diagnosis with lung cancer. J Pain Symptom Manage 42 (2): 202-12, 2011.21398090
Wang M, Cheng HL, Lopez V, et al.: Redefining chemotherapy-induced peripheral neuropathy through symptom cluster analysis and patient-reported outcome data over time. BMC Cancer 19 (1): 1151, 2019.31775665

## Symptom Clusters Common Across Heterogeneous Treatments

Several symptom clusters have been identified across cancer diagnoses and treatments in patients undergoing treatment and throughout survivorship. To date, most studies of symptom clusters in patients undergoing active treatment have analyzed data from patients receiving the same treatment. A limited number of studies suggest the same symptom clusters may occur in groups of patients receiving heterogeneous therapies. A pooled analysis included data from 1,561 patients with advanced cancer in 15 countries. Four symptom clusters were common in patients with myeloma and breast, colorectal, lung, and prostate cancer who were receiving chemotherapy, radiation therapy, analgesics, surgery, and other or no treatments.[1] These clusters included an emotional cluster comprised of feeling tense, worried, irritable, and depressed; a fatigue-pain cluster; a nausea-vomiting cluster; and a cognitive cluster comprised of difficulties with concentration and memory.

In another study of 93 Chinese patients with cervical cancer, mood-cognitive, gastrointestinal, sickness behavior, and pain-related symptom clusters were identified in patients receiving chemoradiation therapy, radiation therapy alone, and surgery followed by chemoradiation. Mean symptom severity scores were not significantly different across these three treatment groups.[2]

Finally, a longitudinal study of 92 patients with metastatic lung cancer assessed interrelationships between depressive symptoms and a sickness behavior symptom cluster. In this sample, 40.5% of participants were receiving chemotherapy, 35.7% were receiving immunotherapy, and 23.8% were receiving oral targeted therapies. All 12 sickness behavior symptoms were significantly associated with patients’ scores on the Patient Health Questionnaire-9 and Hospital Anxiety and Depression Scale depression subscale. Sickness behavior symptom severity was significantly higher in patients receiving chemotherapy than in those receiving oral targeted therapies. However, symptom severity among patients receiving immunotherapy did not differ significantly from symptom severity of the other two groups.[3]

In individuals who have completed primary therapy, psychological/cognitive/fatigue clusters are common (e.g., emotional distress, fatigue, cognitive dysfunction;[4] fatigue, difficulty concentrating, drowsiness[5]). In addition, there is evidence for long-term effects in a sickness behavior cluster (e.g., lethargy, sleepiness, depressed mood, hyperalgesia).[6]

In a study of 300 patients receiving palliative chemotherapy, one of the symptom clusters identified was fatigue-cognitive, which was associated with decreased functional status and poor quality of life.[5] The authors highlighted that fatigue is often included in other clusters (e.g., fatigue, dyspnea, drowsiness, pain). Fatigue has also been identified in sickness behavior clusters.[6] Because fatigue is prevalent across a number of symptom clusters, it may be helpful to target fatigue to mitigate the effects of symptom clusters across patient populations.

Additional research using a person-centered approach is needed to understand the individual experiences of symptom clusters over time. Interventions to mitigate a high symptom burden should be tailored to individual symptom cluster profiles.

### References

Dong ST, Costa DS, Butow PN, et al.: Symptom Clusters in Advanced Cancer Patients: An Empirical Comparison of Statistical Methods and the Impact on Quality of Life. J Pain Symptom Manage 51 (1): 88-98, 2016.26300025
Wang CL, Wu WY, Lou HM, et al.: Analysis of symptom clusters in Chinese cervical cancer patients undergoing radiotherapy, chemoradiotherapy, or postoperative chemoradiotherapy. Eur J Gynaecol Oncol 38 (3): 398-403, 2017.29693881
McFarland DC, Walsh LE, Saracino R, et al.: The Sickness Behavior Inventory-Revised: Sickness behavior and its associations with depression and inflammation in patients with metastatic lung cancer. Palliat Support Care 19 (3): 312-321, 2021.33222717
Levkovich I, Cohen M, Alon S, et al.: Symptom cluster of emotional distress, fatigue and cognitive difficulties among young and older breast cancer survivors: The mediating role of subjective stress. J Geriatr Oncol 9 (5): 469-475, 2018.29759914
Rha SY, Lee J: Symptom clusters during palliative chemotherapy and their influence on functioning and quality of life. Support Care Cancer 25 (5): 1519-1527, 2017.28032218
Zick SM, Zwickey H, Wood L, et al.: Preliminary differences in peripheral immune markers and brain metabolites between fatigued and non-fatigued breast cancer survivors: a pilot study. Brain Imaging Behav 8 (4): 506-16, 2014.24222427

## Pathogenesis of Symptom Clusters

The pathogenesis of symptom clusters has not been clearly established. However, some mechanisms (e.g., chronic inflammation) and interaction effects with patient-specific characteristics (e.g., clinical, environmental, behavioral) are beginning to unfold. Examples of evidence for common pathogenic mechanisms for selected symptom clusters are summarized below.

One or more symptoms associated with the sickness behavior syndrome (e.g., fatigue, sleep disturbance, lethargy, depression, loss of appetite) are common in a number of other symptom clusters.[1-3] It is a plausible model for understanding the pathogenesis of symptom clusters. The physiological and psychological stress of cancer may be an underlying trigger for the co-occurring symptoms identified in symptom clusters.[4] Central nervous system (CNS) activation of acute psychological stress engages the hypothalamic-pituitary-adrenal axis and sympathetic-adrenal-medullary system to produce increased levels of cortisol. Prolonged stress dampens the homeostatic circadian rhythm of cortisol, causing glucocorticoid resistance, in which immune cells become less sensitive to glucocorticoids.[5] Decreased sensitivity triggers increased levels of glucocorticoids [4,5] as well as epinephrine and norepinephrine.[4]

In addition, cellular responses to regain homeostasis, termed allostasis, include secreting catecholamines and cytokines.[5] With chronic stress, allostatic overload occurs with an increase in pro-inflammatory cytokines. In particular, interleukin (IL)-1-beta, IL-6, tumor necrosis factor-alpha (TNF-alpha), and others are secreted.[3-5] Prolonged secretion of IL-1-beta is associated with sickness behavior symptoms through inducing prostaglandins and activating T and B cells and antibodies.[3,5] In addition, IL-6,[6-8] TNF-alpha,[9-11], and nuclear-factor kappa B [12]—a transcription factor that induces multiple inflammatory cytokines to enter into circulation—have been associated with high symptom severity.

Given the psychological influence of CNS-triggered downstream responses that lead to chronic inflammatory-associated symptoms, individual coping mechanisms and levels of resilience to stress may explain some of the interindividual variability in symptom cluster experiences. Research is just beginning to capture the multiple social determinants of health (e.g., social, structural, environmental, behavioral) that may influence an individual’s perception of and response to stress. To best understand the pathogenesis associated with the symptom cluster phenotype, a person-centered approach to research and clinical care is warranted.

### References

Aktas A: Cancer symptom clusters: current concepts and controversies. Curr Opin Support Palliat Care 7 (1): 38-44, 2013.23287418
Chan CW, Lee PH, Molassiotis A, et al.: Symptom Clusters in Postchemotherapy Neutropenic Fever in Hematological Malignancy: Associations Among Sickness Behavior Symptom Cluster, Inflammatory Biomarkers of Procalcitonin and C-Reactive Protein, and Febrile Measures. J Pain Symptom Manage 59 (6): 1204-1211, 2020.31887406
Wood LJ, Weymann K: Inflammation and neural signaling: etiologic mechanisms of the cancer treatment-related symptom cluster. Curr Opin Support Palliat Care 7 (1): 54-9, 2013.23314015
Cui B, Peng F, Lu J, et al.: Cancer and stress: NextGen strategies. Brain Behav Immun 93: 368-383, 2021.33160090
Zefferino R, Di Gioia S, Conese M: Molecular links between endocrine, nervous and immune system during chronic stress. Brain Behav 11 (2): e01960, 2021.33295155
Miaskowski C, Dodd M, Lee K, et al.: Preliminary evidence of an association between a functional interleukin-6 polymorphism and fatigue and sleep disturbance in oncology patients and their family caregivers. J Pain Symptom Manage 40 (4): 531-44, 2010.20570482
Hiensch AE, Mijwel S, Bargiela D, et al.: Inflammation Mediates Exercise Effects on Fatigue in Patients with Breast Cancer. Med Sci Sports Exerc 53 (3): 496-504, 2021.32910094
Lengacher CA, Reich RR, Paterson CL, et al.: A Large Randomized Trial: Effects of Mindfulness-Based Stress Reduction (MBSR) for Breast Cancer (BC) Survivors on Salivary Cortisol and IL-6. Biol Res Nurs 21 (1): 39-49, 2019.30079756
Calvo-Schimmel A, Kober KM, Paul SM, et al.: Sleep disturbance is associated with perturbations in immune-inflammatory pathways in oncology outpatients undergoing chemotherapy. Sleep Med 101: 305-315, 2023.36470166
Dhruva A, Aouizerat BE, Cooper B, et al.: Cytokine gene associations with self-report ratings of morning and evening fatigue in oncology patients and their family caregivers. Biol Res Nurs 17 (2): 175-84, 2015.24872120
Kober KM, Harris C, Conley YP, et al.: Perturbations in common and distinct inflammatory pathways associated with morning and evening fatigue in outpatients receiving chemotherapy. Cancer Med 12 (6): 7369-7380, 2023.36373573
Kober KM, Smoot B, Paul SM, et al.: Polymorphisms in Cytokine Genes Are Associated With Higher Levels of Fatigue and Lower Levels of Energy in Women After Breast Cancer Surgery. J Pain Symptom Manage 52 (5): 695-708.e4, 2016.27664835

## Symptom Clusters by Treatment Modality

Cancerous tissue and treatment-related side effects are common causes of symptoms within a cluster. Of note, disease and treatments are not always directly related to symptom cluster experiences.[1] In a study of 582 patients receiving treatment for heterogenous types of cancer, the type of cancer diagnosis and treatment received did not predict symptom severity subgroups.[1] This finding suggests that multiple factors likely influence symptom cluster experiences. However, based on known contributors to some symptoms by the type of treatment (e.g., taxane-induced neuropathies [2]), the discussion below highlights symptom clusters identified in patients receiving specific therapies.

### Chemotherapy

A substantial body of research has focused on the symptom experiences of people undergoing chemotherapy. To date, symptom clusters have been identified in patients undergoing chemotherapy for brain,[3] breast,[4-11] gastrointestinal,[12,13] gynecologic,[14,15] hematological,[16-19] and lung cancers.[20,21] Symptom clusters have also been identified in samples of patients undergoing chemotherapy for heterogenous cancer types.[22 ,23]

In a 2022 systematic review of studies of symptom clusters in patients undergoing chemotherapy, several common symptom clusters were identified across cancer diagnoses. The most common symptom cluster was comprised of psychological symptoms. “Feeling nervous” (or “feeling anxious”) and “feeling sad” (or “depressed mood”) were the most common symptoms in this cluster. Other common symptoms in this cluster included “feeling irritable,” “worrying,” and “difficulty concentrating.” The second most common symptom cluster involved gastrointestinal symptoms, including nausea and abdominal cramps. Additional symptom clusters identified across diagnoses included the following:[24]

- A nutrition/weight-change symptom cluster, with symptoms such as weight gain, weight loss, decreased appetite, and increased appetite.
- An epithelial/body-image symptom cluster, comprised of itching, hair loss, and skin change.
- A respiratory symptom cluster, comprised of shortness of breath, difficulty breathing, and cough.

Certain symptom clusters are common across a limited number of cancer diagnoses. For example, a systematic review found that a vasomotor-hormonal symptom cluster was identified in studies of patients receiving chemotherapy for breast and gynecologic cancers.[24]

### Radiation Therapy

Symptom clusters have been described in patients receiving radiation therapy (RT) for brain,[25] breast,[26,27] gastrointestinal,[28] head and neck,[29,30,30] and prostate cancers.[31,32] Other studies have found symptoms clusters in patients receiving RT for a number of cancers.[33,34]

In a study of 1,224 patients with breast cancer receiving RT, symptoms found to cluster together before, during, and after RT included depression and anxiety, nausea and appetite loss, pain and tiredness, and drowsiness, dyspnea, and tiredness.[26] A study of 100 patients with head and neck cancer in Taiwan who were undergoing postoperative RT identified two symptom clusters that were stable throughout treatment: a head and neck–specific cluster (including pain, dry mouth, appetite, sleep disturbance, fatigue, drowsiness, distress, and sadness) and a gastrointestinal cluster (including nausea, vomiting, numbness, dyspnea, and difficulty with memory).[35] In 843 patients undergoing RT for prostate cancer, seven symptom clusters were identified. Early symptoms, older age, and decreased physical function were associated with the severity of late symptom clusters.[32]

In addition, polymorphisms in cytokine genes were associated with symptom clusters in a sample of 157 patients receiving RT for breast and prostate cancer, suggesting that common symptom clusters may be related to inflammatory processes.[36] Polymorphisms in neurotransmitter genes were associated with the severity of sickness behavior, mood-cognitive, and treatment-related symptom clusters, suggesting that mechanisms other than inflammation may also contribute to the development of symptom clusters.[37]

### Immunotherapy

Immunotherapies are a relatively new approach to cancer treatments, and numerous newly developed immunotherapy treatments are in phase I clinical trials. As a result, the scope of symptom clusters in patients receiving these therapies is yet to be understood.

### References

Miaskowski C, Cooper BA, Melisko M, et al.: Disease and treatment characteristics do not predict symptom occurrence profiles in oncology outpatients receiving chemotherapy. Cancer 120 (15): 2371-8, 2014.24797450
Wang M, Cheng HL, Lopez V, et al.: Redefining chemotherapy-induced peripheral neuropathy through symptom cluster analysis and patient-reported outcome data over time. BMC Cancer 19 (1): 1151, 2019.31775665
Kim S: A Longitudinal Study of Lipid Peroxidation and Symptom Clusters in Patients With Brain Cancers. Nurs Res 67 (5): 387-394, 2018.30052594
Albusoul RM, Berger AM, Gay CL, et al.: Symptom Clusters Change Over Time in Women Receiving Adjuvant Chemotherapy for Breast Cancer. J Pain Symptom Manage 53 (5): 880-886, 2017.28062343
Berger AM, Kumar G, LeVan TD, et al.: Symptom Clusters and Quality of Life over 1 Year in Breast Cancer Patients Receiving Adjuvant Chemotherapy. Asia Pac J Oncol Nurs 7 (2): 134-140, 2020.32478130
Browall M, Brandberg Y, Nasic S, et al.: A prospective exploration of symptom burden clusters in women with breast cancer during chemotherapy treatment. Support Care Cancer 25 (5): 1423-1429, 2017.27981366
Li H, Sereika SM, Marsland AL, et al.: Symptom Clusters in Women With Breast Cancer During the First 18 Months of Adjuvant Therapy. J Pain Symptom Manage 59 (2): 233-241, 2020.31610271
Sullivan CW, Leutwyler H, Dunn LB, et al.: Stability of Symptom Clusters in Patients With Breast Cancer Receiving Chemotherapy. J Pain Symptom Manage 55 (1): 39-55, 2018.28838866
Wiggenraad F, Bolam KA, Mijwel S, et al.: Long-Term Favorable Effects of Physical Exercise on Burdensome Symptoms in the OptiTrain Breast Cancer Randomized Controlled Trial. Integr Cancer Ther 19: 1534735420905003, 2020.32090630
Vuttanon N, Finnegan L, Lojanapiwat B, et al.: Effect of progressive muscle relaxation on symptom clusters in breast cancer patients receiving chemotherapy: A quasi-experimental controlled trial. Complement Ther Clin Pract 37: 27-31, 2019.31445364
Li H, Sereika SM, Marsland AL, et al.: Impact of chemotherapy on symptoms and symptom clusters in postmenopausal women with breast cancer prior to aromatase inhibitor therapy. J Clin Nurs 28 (23-24): 4560-4571, 2019.31469461
Han CJ, Reding K, Cooper BA, et al.: Stability of Symptom Clusters in Patients With Gastrointestinal Cancers Receiving Chemotherapy. J Pain Symptom Manage 58 (6): 989-1001.e10, 2019.31404646
Han CJ, Reding K, Cooper BA, et al.: Symptom Clusters in Patients With Gastrointestinal Cancers Using Different Dimensions of the Symptom Experience. J Pain Symptom Manage 58 (2): 224-234, 2019.31077784
Pozzar RA, Hammer MJ, Cooper BA, et al.: Symptom Clusters in Patients With Gynecologic Cancer Receiving Chemotherapy. Oncol Nurs Forum 48 (4): 441-452, 2021.34143001
Pozzar RA, Hammer MJ, Cooper BA, et al.: Stability of Symptom Clusters in Patients With Gynecologic Cancer Receiving Chemotherapy. Cancer Nurs 45 (4): E706-E718, 2022 Jul-Aug 01.34560709
Lin DM, Yin XX, Wang N, et al.: Consensus in Identification and Stability of Symptom Clusters Using Different Symptom Dimensions in Newly Diagnosed Acute Myeloid Leukemia Patients Undergoing Induction Therapy. J Pain Symptom Manage 57 (4): 783-792, 2019.30639731
Chen F, Leng Y, Zhang L, et al.: The Correlation of Symptom Clusters and Functional Performance in Adult Acute Leukemia Patients Under Chemotherapy. Cancer Nurs 44 (5): E287-E295, 2021 Sep-Oct 01.32404584
Cherwin CH, Perkhounkova Y: Distress-Based Gastrointestinal Symptom Clusters and Impact on Symptom Interference and Quality of Life in Patients with a Hematologic Malignancy Receiving Chemotherapy. J Pain Symptom Manage 53 (4): 751-758, 2017.28042061
Sezgin MG, Bektaş H: Symptom Clustering and Its Effect on Functional Status in Lymphoma Patients. Florence Nightingale J Nurs 28 (2): 143-154, 2020.34263193
Russell J, Wong ML, Mackin L, et al.: Stability of Symptom Clusters in Patients With Lung Cancer Receiving Chemotherapy. J Pain Symptom Manage 57 (5): 909-922, 2019.30768960
Wong ML, Cooper BA, Paul SM, et al.: Differences in Symptom Clusters Identified Using Ratings of Symptom Occurrence vs. Severity in Lung Cancer Patients Receiving Chemotherapy. J Pain Symptom Manage 54 (2): 194-203, 2017.28533161
Matzka M, Köck-Hódi S, Jahn P, et al.: Relationship among symptom clusters, quality of life, and treatment-specific optimism in patients with cancer. Support Care Cancer 26 (8): 2685-2693, 2018.29473117
Papachristou N, Barnaghi P, Cooper B, et al.: Network Analysis of the Multidimensional Symptom Experience of Oncology. Sci Rep 9 (1): 2258, 2019.30783135
Harris CS, Kober KM, Conley YP, et al.: Symptom clusters in patients receiving chemotherapy: A systematic review. BMJ Support Palliat Care 12 (1): 10-21, 2022.34921000
Langegård U, Johansson B, Bjork-Eriksson T, et al.: Symptom Clusters in Patients With Brain Tumors Undergoing Proton Beam Therapy. Oncol Nurs Forum 46 (3): 349-363, 2019.31007260
Chow S, Wan BA, Pidduck W, et al.: Symptom clusters in patients with breast cancer receiving radiation therapy. Eur J Oncol Nurs 42: 14-20, 2019.31446259
Harris C, Kober KM, Paul SM, et al.: Neurotransmitter Gene Polymorphisms Are Associated with Symptom Clusters in Patients Undergoing Radiation Therapy. Semin Oncol Nurs 39 (4): 151461, 2023.37419849
Poon M, Dennis K, DeAngelis C, et al.: Symptom clusters of gastrointestinal cancer patients undergoing radiotherapy using the Functional Living Index-Emesis (FLIE) quality-of-life tool. Support Care Cancer 23 (9): 2589-98, 2015.25620759
Rosenthal DI, Mendoza TR, Fuller CD, et al.: Patterns of symptom burden during radiotherapy or concurrent chemoradiotherapy for head and neck cancer: a prospective analysis using the University of Texas MD Anderson Cancer Center Symptom Inventory-Head and Neck Module. Cancer 120 (13): 1975-84, 2014.24711162
Xiao W, Chan CWH, Fan Y, et al.: Symptom clusters in patients with nasopharyngeal carcinoma during radiotherapy. Eur J Oncol Nurs 28: 7-13, 2017.28478859
Kim E, Jahan T, Aouizerat BE, et al.: Changes in symptom clusters in patients undergoing radiation therapy. Support Care Cancer 17 (11): 1383-91, 2009.19242732
Lemanska A, Dearnaley DP, Jena R, et al.: Older Age, Early Symptoms and Physical Function are Associated with the Severity of Late Symptom Clusters for Men Undergoing Radiotherapy for Prostate Cancer. Clin Oncol (R Coll Radiol) 30 (6): 334-345, 2018.29459102
Ganesh V, Zhang L, Chan S, et al.: An update in symptom clusters using the Edmonton Symptom Assessment System in a palliative radiotherapy clinic. Support Care Cancer 25 (11): 3321-3327, 2017.28536884
Ganesh V, Zhang L, Wan BA, et al.: Symptom clusters using the EORTC QLQ-C15-PAL in palliative radiotherapy. Ann Palliat Med 7 (2): 192-204, 2018.29764181
Chiang SH, Ho KY, Wang SY, et al.: Change in symptom clusters in head and neck cancer patients undergoing postoperative radiotherapy: A longitudinal study. Eur J Oncol Nurs 35: 62-66, 2018.30057085
Miaskowski C, Conley YP, Mastick J, et al.: Cytokine Gene Polymorphisms Associated With Symptom Clusters in Oncology Patients Undergoing Radiation Therapy. J Pain Symptom Manage 54 (3): 305-316.e3, 2017.28797847
Harris CS, Miaskowski CA, Conley YP, et al.: Gastrointestinal Symptom Cluster is Associated With Epigenetic Regulation of Lymphotoxin Beta in Oncology Patients Receiving Chemotherapy. Biol Res Nurs 25 (1): 51-64, 2023.35929442

## Management of Cancer-Related Symptom Clusters

### General Approach

The first step in the management of symptom clusters involves an open-ended patient interview to identify symptoms that are bothersome. The next step is to identify the most distressing symptoms with significant negative impact on the patient’s quality of life and functioning. A subsequent step is to determine the frequency and severity of the predominant symptoms. This step can be accomplished with a guided interview and objective assessment of individual symptoms using validated questionnaires. For more information, see Fatigue, Depression, and Sleep Disorders.

Another important step is to identify the nature of relationships among the symptoms if one exists. This step is critical to minimize unnecessary interventions that might be burdensome for patients already struggling with multiple symptoms and quality-of-life issues. Associations among symptoms in a cluster inform management of symptoms in that cluster. Different ways that symptoms in a cluster may be related to each other include the following:

- A primary symptom leading to other symptoms in a symptom cluster (e.g., insomnia leading to fatigue, anxiety, and depression; hot flashes causing insomnia, which in turn causes anxiety and fatigue; pain causing anxiety and insomnia). In such cases, management will involve first treating the primary symptom if it can be identified.
- Symptoms as side effects of a treatment used to treat another symptom (e.g., daytime fatigue as a side effect of hypnotics used to treat insomnia or mirtazapine used to treat depression). Management in such cases involves identifying alternative treatments or optimizing the dose of the triggering medication to minimize the symptom/side effect.
- Common biological mechanisms underlying multiple symptoms (e.g., an inflammatory mechanism underlying fatigue, depression, sleep disturbances, and cognitive issues). The underlying inflammatory process may be a treatment target. In some cases, management may involve optimizing cancer treatment regimens, considering the risk-benefit ratio.
- Common psychological and/or social factors underlying symptom clusters (e.g., fear of cancer recurrence that causes anxiety, insomnia, and depression; financial or relationship issues as a trigger for insomnia, anxiety, and depression). Addressing the underlying psychological or social factor is the primary treatment strategy in these cases.

Most symptom management studies test the efficacy of the proposed intervention on a single target symptom as the primary outcome and evaluate secondary impact on a related set of symptoms or on the overall symptom burden.[1- 4] A small number of studies have evaluated the efficacy of certain interventions on multiple co-occurring and related symptoms in symptom clusters. A randomized controlled trial using cognitive behavioral therapy for insomnia (CBT-I) showed improvement in insomnia, fatigue, and depression symptoms.[1,3,4] Another controlled trial found improvement in cognitive, gastrointestinal, and other symptom clusters using a multimodal intervention that included structured exercise, relaxation, and psychosocial support.[5]

An important part of managing symptom clusters involves patient and caregiver education. Such education includes discussion of co-occurrence of symptoms and their potential relationship to each other. Patients can also be informed that an intervention targeting a specific symptom may impact other, related symptoms. Another step involves identification of symptoms that may be due to side effects of another intervention. In these cases, addressing the target symptom involves optimizing the triggering intervention or, if possible, considering alternative treatments.

If an intervention is deemed necessary, pharmacological and nonpharmacological strategies can be considered (see Table 1).

Table 1. Effective Treatment Modalities Across Multiple Cancer Symptoms and Symptom Clusters

Symptoms | SNRIs^a^ | Exercise | E+R | Mindfulness | | CBT | | ACT | MCP | PAP
| | | | MBSR-BC | MBAT | CBT | CBT-I
Depression | X | X | | X | | | X | X | X | X
Pain | | | | | | X
CIPN | X
Lymphedema | | X
Anxiety | | X | | X | | | | X | X | X
Hot flashes | X
Fatigue | | X | | X | | X | X
Low energy | | | | X
Sleep disturbance | | X | | | | X | X
Bowel dysfunction | | | | | | X
Perceived stress/distress | | | | X | X | X | | X
Physical function | X | | | X
Psychological/psychosocial function | | | | X | | X | | | X
Spiritual well-being | | | | | | | | | X
Quality of life | X | | | | X | X | | X
Symptom Clusters
Gastrointestinal (nausea, vomiting, stomach pain, loss of appetite, diarrhea) | | | X
Cognitive (decreased concentration, memory problems, fatigue) | | | X
Functional (muscle aches, joint aches) | | | X
Mucositis; mouth pain (throat pain, difficulty swallowing) | | | X

ACT = acceptance and commitment therapy; CBT = cognitive behavioral therapy; CBT-I = cognitive behavioral therapy–insomnia; CIPN = chemotherapy-induced peripheral neuropathy; E+R = exercise + relaxation; MBAT = mindfulness-based art therapy; MBSR-BC = mindfulness-based stress reduction–British Columbia; MCP = meaning-centered psychotherapy; PAP = psilocybin-assisted psychotherapy; SNRIs = serotonin-norepinephrine reuptake inhibitors.

^a^Duloxetine and venlafaxine.

For more information about individual side effects, see the summaries on Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care).

### Pharmacological Interventions

Studies investigating pharmacological interventions generally target a primary symptom while evaluating the impact on other, related symptoms as secondary outcomes. Certain pharmacological interventions have shown efficacy in the management of multiple symptoms in separate studies. For example, serotonin-norepinephrine reuptake inhibitors (SNRIs), specifically duloxetine and venlafaxine, are known to treat depression (see the Pharmacological Intervention section in Depression). SNRIs are also effective in the management of chemotherapy-induced peripheral neuropathy (CIPN) (see the Venlafaxine and duloxetine section in Cancer Pain).[6] Venlafaxine has also shown efficacy in the management of hot flashes in breast cancer survivors.[7] These efficacy studies targeting specific symptoms have been conducted in patients with cancer and in general patient populations.

When pharmacological interventions are considered, the primary goal is to optimize the medication regimen and minimize side-effect burden. Steps to achieve this goal include the following:

- Review the patient’s medication list to check if the target symptom is due to side effects of a medication. If a triggering medication is identified, assess if the medication is necessary. If the medication is deemed necessary, examine the dose and/or frequency. Alternatively, consider a substitute medication with similar efficacy but fewer possible side effects causing the target symptom.
- If a pharmacological intervention is considered, it is important to select a medication that can target multiple symptoms if possible. This strategy can help minimize the side-effect burden.

### Nonpharmacological Interventions

Nonpharmacological interventions for the management of cancer-related symptom clusters may include exercise, mindfulness, and psychological therapies.

#### Exercise

Exercise has been defined as physical activity that is planned or structured and involves repetitive bodily movements to improve or maintain cardiorespiratory endurance, muscular strength, muscular endurance, flexibility, and body composition. Physical activity has been defined as bodily movements produced by skeletal muscles that result in energy expenditure.[8] Physical activity can include all levels of intensity, including light, moderate, moderate-to-vigorous, and vigorous.[9]

The American College of Sports Medicine’s published recommendations for exercise in cancer survivors suggest starting slowly and progressing to 150 minutes of moderate-intensity or 75 minutes of vigorous-intensity aerobic exercise per week.[10] This aerobic exercise is accompanied by 20 to 30 minutes of strength training across all major muscle groups 2 to 3 times per week and regular stretching daily. Investigators have examined multiple forms of physical activity and their impact on cancer-related symptoms. This activity includes aerobic, anaerobic, muscle-strengthening, bone-strengthening, balance, and flexibility exercises, as well as yoga, tai chi, and qigong. However, most of this research has focused on a primary symptom versus a symptom cluster. A recent consensus statement regarding specific exercise guidelines for cancer survivors identified strong evidence for individual symptom management with exercise for anxiety, depression, and fatigue.[11] (Strong evidence was defined as having five or more randomized controlled trials with samples sizes of more than150 participants.) In addition, strong evidence was identified for better management of lymphedema, physical function, and health-related quality of life with exercise.[11] Of note, moderate evidence for bone health and sleep was identified, while insufficient evidence was found for cardiotoxicity, CIPN, pain, cognitive function, falls, nausea, sexual function, and treatment tolerance.[11]

The role of exercise in managing symptom clusters is more limited.[12-15] One study used a multimodal intervention of structured exercise, relaxation, and psychosocial support to address symptom clusters.[5] It noted improvement in gastrointestinal (nausea, vomiting, stomach pain, loss of appetite, diarrhea), cognitive (diminished concentration, memory problems, fatigue), functional (muscle and joint aches), and mucositis (mouth pain, throat pain, and difficulty swallowing) symptom clusters in the treatment group, but no improvement in an affective (nervousness, anxiety, and stress) symptom cluster, compared with usual care.

#### Mindfulness-based stress reduction (MBSR)

Studies investigating mindfulness commonly involve evaluation of its impact on a primary target symptom and on other, related symptoms as secondary outcomes. Studies that examined different approaches to MBSR–British Columbia (MBSR-BC) have found predominantly strong positive impacts on symptoms clusters, including combinations of the following:[16-26]

- Perceived stress.
- Anxiety.
- Low energy and physical functioning.
- Psychosocial health.
- Fatigue.
- Depression.
- Feelings of helplessness.
- Hostility/anger.
- Fear of cancer recurrence.
- Coping abilities.
- Catastrophizing.

Many of the MBSR interventions involved multiweek programs in which participants were assessed for outcomes at 3-, 6- and 12-month intervals. During this time, survivors participated in mindfulness training and various exercises and were encouraged to continue using these skills on an ongoing basis. Improvement was measured using the following tools and scales:

- Profile of Mood States.
- Functional Assessment of Cancer Therapy–Endocrine Symptoms.
- World Health Organization-5 Well-being Index.
- Pain Intensity Scale.
- Global Severity Index, SCL-90-R.

MBSR-BC consists of three components:

- Educational material related to relaxation, meditation, the mind-body connection, and a healthy lifestyle for survivors.
- Practice of meditation in group meetings and homework assignments.
- Group processes related to barriers to the practice of meditation and supportive group interaction.

Many studies have evaluated mindfulness for improvement in anxiety and stress symptoms during cancer treatment. Patients who received MBSR while undergoing chemotherapy were shown to have reduced scores on an “overall suffering score.”[16-18,21-25] In two of the studies, technology was used to administer the intervention, one online [25] and another via smartphone.[22] These delivery methods provided more opportunities to incorporate mindfulness practices into the treatment of cancer survivors. In addition, some studies showed that the intervention groups had a lower symptom burden, compared with control groups, including more significant remission of both anxiety and depressive symptoms.[20] Measures of health-related quality of life (as demonstrated by the Functional Assessment of Cancer Therapy–Breast) were also significantly higher in the intervention group than in the control group.

Fatigue is a common complaint of cancer survivors at all stages, and it contributes to deterioration in many, if not all, psychosocial complaints. Integrating MBSR into cancer care can have many positive outcomes, including reduced fatigue.[17,18,22,26,27] Study participants experienced improvements in other psychosocial areas as well. Compared with control-group participants, those receiving MBSR had a statistically significant reduction in the overall suffering score, improvement in the total Hospital Anxiety and Depression Scale score, and improvement in the total Functional Assessment of Chronic Illness Therapy-Spiritual Well-Being score.[28] In a randomized study of 92 patients, the intervention group experienced positive effects of concurrent MBSR on fatigue and coping while starting adjuvant paclitaxel.[26] While the interventions lasted 1 to 2 months in most cases, results at 6 to 12 months of follow-up showed maintained improvement.[17,18,22,26,27]

Another study, of 191 women with documented stress, showed an overall improvement in psychosocial stress and quality-of-life measures after receiving mindfulness-based art therapy (MBAT) versus standard education support groups. Significant improvements were observed immediately after intervention and 6 months later.[29] Patients with self-reported high levels of stress also experienced stress reduction with MBAT, compared with the standard education support groups.

#### Psychological therapies

Difficulty with sleep initiation and maintenance often co-occur with anxiety, depression, fatigue, and chronic pain.[30] There are a number of complex interactions with psychological disturbances mediating the relationship between pain and fatigue.[31] With these common symptoms, psychological therapies that target, or are known to create downstream effects on, multiple morbidities help patients address these issues through a single psychotherapeutic approach.

##### Cognitive behavioral therapy (CBT)

CBT specifically targets the patient’s maladaptive thoughts and behaviors that interfere with quality of life. CBT is a problem-focused form of therapy that encourages patients to take an active role in changing their thoughts and behaviors. This form of therapy can address several different cognitive, behavioral, and health targets. It can be provided in individual, group, or telehealth formats. Mobile apps based on cognitive behavioral principles have been successful in treating common psychological symptoms and psychological symptom clusters.[32]

In a multisite randomized controlled trial, 131 patients with cancer were randomly assigned to five sessions of standard CBT, five sessions of profile-tailored CBT, or usual care.[33] Assessments occurred at baseline, 1-month follow-up, and 6-month follow-up. Short- and long-term follow-ups suggested that the patients who received the profile-tailored CBT approach showed significant reductions in levels of pain, pain-associated sleep interference, confusion, bowel patterns, distress, functional status, and mental quality of life, compared with patients in the other two groups. Patients in the standard CBT group showed improvements in the common symptom clusters, compared with patients in the usual care group.

In another study, a cohort of 86 patients with mixed cancer diagnoses were randomly assigned to a 2-week, patient-directed intervention using cognitive behavioral principles or usual care.[34] The cognitive-behavioral intervention showed efficacy in treating a pain, fatigue, and sleep-disturbance symptom cluster. For patients experiencing this common symptom cluster acutely or mildly, a self-directed approach may be useful.

##### Acceptance and commitment therapy (ACT)

ACT is called a “Third Wave” CBT approach in that there are similarities to CBT, but the goal is to accept emotions and to understand situations that cannot be changed. This approach is considered an emotion-focused form of therapy. It comprises several techniques, including mindfulness and decreasing judgment about one’s thoughts and behaviors in any given situation.

Studies have shown strong empirical support for ACT’s positive benefits for the psychological symptom cluster (depression, anxiety, distress, quality of life) for patients at all stages of cancer. However, few studies have examined its effect on physical and health outcomes.[35] Those studies have shown no significant change in physical markers (pain, fatigue, sleep) after ACT therapy in patients with cancer. While there have been empirical studies of ACT in a number of cultures, countries, and ethnicities, most of the research has focused on female-specific cancers such as breast and ovarian.[36-39] There is limited empirical research on the applicability of ACT for males with cancer or patients experiencing physical symptoms.[38]

##### Meaning-centered psychotherapy

This form of psychotherapy, also called existential psychotherapy or meaning-making psychotherapy, is theoretically rooted in Victor Frankl’s book, Man’s Search for Meaning.[40] Empirical studies have shown that this approach may be useful for patients experiencing both psychological and common symptom clusters, especially in relation to end-of-life and survivorship concerns.[41]

A randomized controlled trial of 253 patients with stage III or IV solid-tumor cancer compared meaning-centered therapy with the active placebo of supportive group therapy. After 8 weekly group sessions, the group receiving meaning-centered therapy had stronger reductions in the psychological symptom clusters, as well as greater increases in spiritual well-being, than the placebo group.[42,43]

Meaning-centered psychotherapy has also been tested using an individual therapy approach. A group of 120 patients were randomly assigned to 7 weeks of individual manualized psychotherapy or therapeutic massage. At the end of treatment, patients who received meaning-centered psychotherapy showed improvement in both psychological-cluster symptoms (quality of life, spiritual well-being), as well as physical-cluster symptoms (physical symptom distress, number of physical symptoms).[44] A follow-up study randomly assigned 321 patients with advanced cancer to one of three arms: individual meaning-making psychotherapy, individual supportive psychotherapy, or enhanced usual care. After 8 weeks of treatment, patients receiving meaning-making psychotherapy showed significant improvements in the psychological-symptoms cluster, compared with those receiving enhanced usual care. They also had smaller but significant improvements in the physical-symptoms cluster, compared with those receiving supportive psychotherapy.[45]

### Specific Evidence-Based Interventions

#### Managing Cancer and Living Meaningfully (CALM)

CALM is a brief (2–6 sessions), individual, manualized psychotherapy intervention that is designed to address the psychological symptom cluster in patients with advanced cancer. A randomized controlled trial of 305 patients were divided into CALM (n = 151) or usual care (n = 154) groups. At both the immediate and 6-month follow-up points, patients in the CALM group had fewer depressive symptoms, less end-of-life distress, and greater preparation for the end of life, compared with patients in the usual care group. When CALM outcomes were analyzed among patients with moderate anxiety about death, patients in the CALM group showed significantly greater spiritual well-being and lower levels of anxiety and demoralization at 6 months compared with patients in the usual care group. The brief, individual CALM intervention may be most useful for patients experiencing moderate anxiety about death and the psychological symptom cluster than for those with high or low anxiety about death.[46,47]

#### Cognitive behavioral therapy for insomnia (CBT-I)

CBT-I includes techniques such as stimulus control, sleep restriction, and relaxation training to address the cognitive and behavioral components that contribute to disrupted sleep. While CBT-I focuses on sleep, studies have shown that it has other psychological and physical impacts.[48] Studies of CBT-I in patients without cancer have found benefits with pain management, depression, and disability.[49]

A 2 x 2 randomized controlled trial of 67 cancer survivors assessed the effects of armodafinil and CBT-I on sleep quality, fatigue, and depression. Symptoms were assessed at three time points: before intervention, immediately after the 7-week intervention, and at the 3-month follow-up. Patients who received CBT-I had significantly improved sleep, fatigue, and depression levels, in addition to reduced hypnotic medication use, at both the post intervention and 3-month follow-up. Patients who received the pharmacological intervention experienced no changes to any of these variables. Path analysis showed that improvement in depressive symptoms was mediated by insomnia severity, suggesting that treatment of sleep disruptions with CBT-I can have a clinically meaningful effect on depressive symptoms.[3]

Studies of CBT-I in patients without cancer have found additional benefits for pain management, depression, and disability.[49] There is extremely limited data on the effect of CBT-I on pain outcomes in patients with cancer.

When patients with cancer are treated at the acute stage of insomnia, minimal and digital forms of CBT-I have also been found to be useful in randomized controlled trials. Minimal forms include psychoeducation booklets and three phone consultations with a sleep psychologist.[50] Digital forms include self-directed apps via computer or smartphone.[51] These studies have found an impact of CBT-I on sleep measures, as well as psychological-cluster symptoms (depression, anxiety, distress).

#### Psilocybin-assisted psychotherapy

A potential treatment to address the psychological and common symptom clusters is psilocybin-assisted psychotherapy. While more research is needed before it becomes an evidence-based practice, promising early research results have been disseminated widely on a number of news and blog sites, increasing patient interest in this approach to therapy.

In a double-blind randomized controlled trial, 29 patients with advanced cancer and related anxiety and depression received 7 weeks of psychotherapy and a single dose of either psilocybin or niacin. Patients who received the psilocybin plus psychotherapy showed significant reductions in the severity of symptoms in the psychological symptom cluster.[52] A follow-up study of patients who were still alive (n = 15) showed that these improvements were maintained for 3.2 to 4.5 years after the original study.[53] This emerging treatment continues to develop with wider groups of cancer patients and long-term assessments of multisymptom clusters.

### References

Heckler CE, Garland SN, Peoples AR, et al.: Cognitive behavioral therapy for insomnia, but not armodafinil, improves fatigue in cancer survivors with insomnia: a randomized placebo-controlled trial. Support Care Cancer 24 (5): 2059-2066, 2016.26542272
Moss EL, Simpson JS, Pelletier G, et al.: An open-label study of the effects of bupropion SR on fatigue, depression and quality of life of mixed-site cancer patients and their partners. Psychooncology 15 (3): 259-67, 2006.16041840
Peoples AR, Garland SN, Pigeon WR, et al.: Cognitive Behavioral Therapy for Insomnia Reduces Depression in Cancer Survivors. J Clin Sleep Med 15 (1): 129-137, 2019.30621831
Roscoe JA, Garland SN, Heckler CE, et al.: Randomized placebo-controlled trial of cognitive behavioral therapy and armodafinil for insomnia after cancer treatment. J Clin Oncol 33 (2): 165-71, 2015.25452447
Jarden M, Nelausen K, Hovgaard D, et al.: The effect of a multimodal intervention on treatment-related symptoms in patients undergoing hematopoietic stem cell transplantation: a randomized controlled trial. J Pain Symptom Manage 38 (2): 174-90, 2009.19345060
Song SY, Ko YB, Kim H, et al.: Effect of serotonin-norepinephrine reuptake inhibitors for patients with chemotherapy-induced painful peripheral neuropathy: A meta-analysis. Medicine (Baltimore) 99 (1): e18653, 2020.31895829
Ramaswami R, Villarreal MD, Pitta DM, et al.: Venlafaxine in management of hot flashes in women with breast cancer: a systematic review and meta-analysis. Breast Cancer Res Treat 152 (2): 231-7, 2015.26067931
Caspersen CJ, Powell KE, Christenson GM: Physical activity, exercise, and physical fitness: definitions and distinctions for health-related research. Public Health Rep 100 (2): 126-31, 1985.3920711
2018 Physical Activity Guidelines Scientific Committee: 2018 Physical Activity Guidelines Advisory Committee Scientific Report. Washington, DC: U.S. Department of Health and Human Services, 2018. Available online (https://health.gov/sites/default/files/2019-09/PAG_Advisory_Committee_Report.pdf).
Schmitz KH, Courneya KS, Matthews C, et al.: American College of Sports Medicine roundtable on exercise guidelines for cancer survivors. Med Sci Sports Exerc 42 (7): 1409-26, 2010.20559064
Campbell KL, Winters-Stone KM, Wiskemann J, et al.: Exercise Guidelines for Cancer Survivors: Consensus Statement from International Multidisciplinary Roundtable. Med Sci Sports Exerc 51 (11): 2375-2390, 2019.31626055
Zhi WI, Baser RE, Zhi LM, et al.: Yoga for cancer survivors with chemotherapy-induced peripheral neuropathy: Health-related quality of life outcomes. Cancer Med 10 (16): 5456-5465, 2021.34213086
Carson JW, Carson KM, Porter LS, et al.: Yoga of Awareness program for menopausal symptoms in breast cancer survivors: results from a randomized trial. Support Care Cancer 17 (10): 1301-9, 2009.19214594
Cho MH, Dodd MJ, Cooper BA, et al.: Comparisons of exercise dose and symptom severity between exercisers and nonexercisers in women during and after cancer treatment. J Pain Symptom Manage 43 (5): 842-54, 2012.22436836
Dodd MJ, Cho MH, Miaskowski C, et al.: A randomized controlled trial of home-based exercise for cancer-related fatigue in women during and after chemotherapy with or without radiation therapy. Cancer Nurs 33 (4): 245-57, 2010.20467301
Henderson VP, Massion AO, Clemow L, et al.: A randomized controlled trial of mindfulness-based stress reduction for women with early-stage breast cancer receiving radiotherapy. Integr Cancer Ther 12 (5): 404-13, 2013.23362338
Hoffman CJ, Ersser SJ, Hopkinson JB, et al.: Effectiveness of mindfulness-based stress reduction in mood, breast- and endocrine-related quality of life, and well-being in stage 0 to III breast cancer: a randomized, controlled trial. J Clin Oncol 30 (12): 1335-42, 2012.22430268
Johns SA, Brown LF, Beck-Coon K, et al.: Randomized controlled pilot study of mindfulness-based stress reduction for persistently fatigued cancer survivors. Psychooncology 24 (8): 885-93, 2015.25132206
Lengacher CA, Johnson-Mallard V, Post-White J, et al.: Randomized controlled trial of mindfulness-based stress reduction (MBSR) for survivors of breast cancer. Psychooncology 18 (12): 1261-72, 2009.19235193
Liu W, Liu J, Ma L, et al.: Effect of mindfulness yoga on anxiety and depression in early breast cancer patients received adjuvant chemotherapy: a randomized clinical trial. J Cancer Res Clin Oncol 148 (9): 2549-2560, 2022.35788727
Park S, Sato Y, Takita Y, et al.: Mindfulness-Based Cognitive Therapy for Psychological Distress, Fear of Cancer Recurrence, Fatigue, Spiritual Well-Being, and Quality of Life in Patients With Breast Cancer-A Randomized Controlled Trial. J Pain Symptom Manage 60 (2): 381-389, 2020.32105790
Shao D, Zhang H, Cui N, et al.: The efficacy and mechanisms of a guided self-help intervention based on mindfulness in patients with breast cancer: A randomized controlled trial. Cancer 127 (9): 1377-1386, 2021.33332582
Sheikhzadeh M, Zanjani Z, Baari A: Efficacy of Mindfulness-Based Cognitive Therapy and Cognitive Behavioral Therapy for Anxiety, Depression, and Fatigue in Cancer Patients: A Randomized Clinical Trial. Iran J Psychiatry 16 (3): 271-280, 2021.34616460
Würtzen H, Dalton SO, Elsass P, et al.: Mindfulness significantly reduces self-reported levels of anxiety and depression: results of a randomised controlled trial among 336 Danish women treated for stage I-III breast cancer. Eur J Cancer 49 (6): 1365-73, 2013.23265707
Yıldırım D, Çiriş Yıldız C: The Effect of Mindfulness-Based Breathing and Music Therapy Practice on Nurses' Stress, Work-Related Strain, and Psychological Well-being During the COVID-19 Pandemic: A Randomized Controlled Trial. Holist Nurs Pract 36 (3): 156-165, 2022 May-Jun 01.35435877
Gok Metin Z, Karadas C, Izgu N, et al.: Effects of progressive muscle relaxation and mindfulness meditation on fatigue, coping styles, and quality of life in early breast cancer patients: An assessor blinded, three-arm, randomized controlled trial. Eur J Oncol Nurs 42: 116-125, 2019.31520865
Salvador C, Mark P, Hoenemeyer T, et al.: Prospective feasibility study of a mindfulness-based program for breast cancer patients in the southeastern US. Complement Ther Clin Pract 49: 101639, 2022.35841719
Tan SB, Chee CH, Ngai CF, et al.: Mindfulness-based supportive therapy on reducing suffering in patients with advanced cancer: randomised controlled trial. BMJ Support Palliat Care 13 (e3): e1117-e1125, 2024.35459688
Marzorati C, Riva S, Pravettoni G: Who Is a Cancer Survivor? A Systematic Review of Published Definitions. J Cancer Educ 32 (2): 228-237, 2017.26854084
Calvo-Schimmel A, Paul SM, Cooper BA, et al.: Oncology Outpatients With Worse Anxiety and Sleep Disturbance Profiles Are at Increased Risk for a Higher Symptom Burden and Poorer Quality of Life. Cancer Nurs 46 (6): 417-431, 2023 Nov-Dec 01.35688433
Bonhof CS, van de Poll-Franse LV, Vissers PAJ, et al.: Anxiety and depression mediate the association between chemotherapy-induced peripheral neuropathy and fatigue: Results from the population-based PROFILES registry. Psychooncology 28 (9): 1926-1933, 2019.31293046
Kwekkeboom KL, Abbott-Anderson K, Wanta B: Feasibility of a patient-controlled cognitive-behavioral intervention for pain, fatigue, and sleep disturbance in cancer. Oncol Nurs Forum 37 (3): E151-9, 2010.20439200
Dalton JA, Keefe FJ, Carlson J, et al.: Tailoring cognitive-behavioral treatment for cancer pain. Pain Manag Nurs 5 (1): 3-18, 2004.14999649
Kwekkeboom KL, Abbott-Anderson K, Cherwin C, et al.: Pilot randomized controlled trial of a patient-controlled cognitive-behavioral intervention for the pain, fatigue, and sleep disturbance symptom cluster in cancer. J Pain Symptom Manage 44 (6): 810-22, 2012.22771125
Zhao C, Lai L, Zhang L, et al.: The effects of acceptance and commitment therapy on the psychological and physical outcomes among cancer patients: A meta-analysis with trial sequential analysis. J Psychosom Res 140: 110304, 2021.33248396
Najvani BD, Neshatdoost HT, Abedi MR: The effect of acceptance and commitment therapy on depression and psychological flexibility in women with breast cancer. Zahedan J Res Med Sci. 17 (4): e965, 2015. Available online (https://brieflands.com/articles/zjrms-965).
Montazer A, Nemati F, Dehghani F: Efficacy of acceptance and commitment therapy on breast cancer female patients' hope. Iranian Journal of Cancer Prevention. 10 (2): e5526, 2017. Available online (https://brieflands.com/articles/ijcm-5526.html).
Mosher CE, Secinti E, Li R, et al.: Acceptance and commitment therapy for symptom interference in metastatic breast cancer patients: a pilot randomized trial. Support Care Cancer 26 (6): 1993-2004, 2018.29327085
Rost AD, Wilson K, Buchanan E: Improving psychological adjustment among late-stage ovarian cancer patients: examining the role of avoidance in treatment. Cognitive and Behavioral Practice. 19 (4): 508-17, 2012. Available online (https://www.sciencedirect.com/science/article/pii/S1077722912000132).
Frankl VE: Man's Search for Meaning. Beacon Press, 2006. Also available online (https://www.beacon.org/Mans-Search-for-Meaning-P602.aspx).
van der Spek N, Vos J, van Uden-Kraan CF, et al.: Meaning making in cancer survivors: a focus group study. PLoS One 8 (9): e76089, 2013.24086695
Breitbart W, Rosenfeld B, Gibson C, et al.: Meaning-centered group psychotherapy for patients with advanced cancer: a pilot randomized controlled trial. Psychooncology 19 (1): 21-8, 2010.19274623
Breitbart W, Rosenfeld B, Pessin H, et al.: Meaning-centered group psychotherapy: an effective intervention for improving psychological well-being in patients with advanced cancer. J Clin Oncol 33 (7): 749-54, 2015.25646186
Breitbart W, Poppito S, Rosenfeld B, et al.: Pilot randomized controlled trial of individual meaning-centered psychotherapy for patients with advanced cancer. J Clin Oncol 30 (12): 1304-9, 2012.22370330
Breitbart W, Pessin H, Rosenfeld B, et al.: Individual meaning-centered psychotherapy for the treatment of psychological and existential distress: A randomized controlled trial in patients with advanced cancer. Cancer 124 (15): 3231-3239, 2018.29757459
Lo C, Hales S, Jung J, et al.: Managing Cancer And Living Meaningfully (CALM): phase 2 trial of a brief individual psychotherapy for patients with advanced cancer. Palliat Med 28 (3): 234-42, 2014.24170718
Rodin G, Lo C, Rydall A, et al.: Managing Cancer and Living Meaningfully (CALM): A Randomized Controlled Trial of a Psychological Intervention for Patients With Advanced Cancer. J Clin Oncol 36 (23): 2422-2432, 2018.29958037
Matthews EE, Berger AM, Schmiege SJ, et al.: Cognitive behavioral therapy for insomnia outcomes in women after primary breast cancer treatment: a randomized, controlled trial. Oncol Nurs Forum 41 (3): 241-53, 2014.24650832
Enomoto K, Adachi T, Fujino H, et al.: Comparison of the effectiveness of cognitive behavioral therapy for insomnia, cognitive behavioral therapy for pain, and hybrid cognitive behavioral therapy for insomnia and pain in individuals with comorbid insomnia and chronic pain: A systematic review and network meta-analysis. Sleep Med Rev 66: 101693, 2022.36410076
Casault L, Savard J, Ivers H, et al.: A randomized-controlled trial of an early minimal cognitive-behavioural therapy for insomnia comorbid with cancer. Behav Res Ther 67: 45-54, 2015.25746777
Ritterband LM, Bailey ET, Thorndike FP, et al.: Initial evaluation of an Internet intervention to improve the sleep of cancer survivors with insomnia. Psychooncology 21 (7): 695-705, 2012.21538678
Ross S, Bossis A, Guss J, et al.: Rapid and sustained symptom reduction following psilocybin treatment for anxiety and depression in patients with life-threatening cancer: a randomized controlled trial. J Psychopharmacol 30 (12): 1165-1180, 2016.27909164
Agin-Liebes GI, Malone T, Yalch MM, et al.: Long-term follow-up of psilocybin-assisted psychotherapy for psychiatric and existential distress in patients with life-threatening cancer. J Psychopharmacol 34 (2): 155-166, 2020.31916890

## Latest Updates to This Summary (07/11/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This is a new summary.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the identification and management of symptom clusters. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Symptom Clusters in Cancer are:

- Marilyn J. Hammer, PhD, DC, RN, FAAN (Dana-Farber Cancer Institute)
- Jayesh Kamath, MD, PhD (University of Connecticut Health Center)
- Edward B. Perry, MD (VA Connecticut Healthcare System)
- Rachel A. Pozzar, PhD, RN (Dana-Farber Cancer Institute)
- Diane Von Ah, PhD, RN, FAAN (The Ohio State University)
- Amy Wachholtz, PhD, MDiv, MS, ABPP (University of Colorado)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Symptom Clusters in Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/cancer-symptom-clusters-hp-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).